# Childhood Melanoma Treatment (PDQ®)

Health Professional Version

This PDQ cancer information summary for health professionals provides comprehensive, peer-reviewed, evidence-based information about the treatment of pediatric melanoma. It is intended as a resource to inform and assist clinicians in the care of their patients. It does not provide formal guidelines or recommendations for making health care decisions.

This summary is reviewed regularly and updated as necessary by the PDQ Pediatric Treatment Editorial Board, which is editorially independent of the National Cancer Institute (NCI). The summary reflects an independent review of the literature and does not represent a policy statement of NCI or the National Institutes of Health (NIH).

## Incidence

Melanoma is rare in children. However, it is the most common skin cancer in children, followed by basal cell carcinomas and squamous cell carcinomas.[1 -8]

Approximately 300 cases of melanoma are diagnosed each year in patients younger than 20 years in the United States, accounting for 0.3% of all new cases of melanoma.[9] Melanoma accounts for about 3% of all cancers in children aged 15 to 19 years.[10]

Melanoma annual incidence in the United States increases with age, as shown in Figure 1 from the National Childhood Cancer Registry (NCCR).[10] For children younger than 10 years, the incidence rate is approximately 1 to 2 cases per 1 million. During adolescence, the rates increase steadily with age, although they are much lower than those observed in adults.[10,11]

Figure 1 also shows that among adolescents aged 15 to 19 years, melanoma rates are significantly higher for females (10.4 per 1 million; 95% confidence interval [CI], 9.4–11.5) than males (5.7 per 1 million; 95% CI, 5.0–6.6). Incidence rates for children younger than 15 years do not differ significantly between girls and boys.

Figure 1. Melanoma incidence rates by age at diagnosis from 2016 to 2020. Reprinted with permission from the National Childhood Cancer Registry. NCCR*Explorer: An interactive website for NCCR cancer statistics [Internet]. National Cancer Institute; 2023 Sep 7. [updated: 2023 Sep 8; cited 2023 Dec 15]. Available from: https://nccrexplorer.ccdi.cancer.gov.

Graph showing the incidence rates of melanoma from 2016 to 2020, according to age at diagnosis. The incidence rates in males, females, and both sexes are shown.

The incidence of pediatric melanoma (aged 0–19 years) increased by an average of 1.6% per year between 1975 and 1996. As shown in Figure 2, melanoma incidence continued to increase through 2003 for adolescents (aged 15–19 years), but it subsequently dropped significantly by approximately 6% per year.[10] During this same period, the incidence decreased slightly for children aged 0 to 14 years, but the change over time was not significant. The reason for the decline in melanoma incidence among adolescents aged 15 to 19 years is not known, but possible explanations include increased use of sunscreen and protective clothing, increased dermatological care, and reduced access to tanning beds.[11]

Figure 2. Trends in melanoma age-adjusted incidence rates from 1999 to 2020 for adolescents aged 15 to 19 years. Reprinted with permission from the National Childhood Cancer Registry. NCCR*Explorer: An interactive website for NCCR cancer statistics [Internet]. National Cancer Institute; 2023 Sep 7. [updated: 2023 Sep 8; cited 2023 Dec 15]. Available from: https://nccrexplorer.ccdi.cancer.gov.

Graph showing trends in age-adjusted incidence rates of melanoma from 1999 to 2020, in adolescents aged 15 to 19 years.

A retrospective study of 22,524 skin pathology reports from patients younger than 20 years identified 38 melanomas, 33 of which occurred in patients aged 15 to 19 years. Investigators reported that the number of lesions that needed to be excised to identify one melanoma was 479.8, which is 20 times higher than in the adult population.[12]

### References

Sasson M, Mallory SB: Malignant primary skin tumors in children. Curr Opin Pediatr 8 (4): 372-7, 1996.8954269 97112590
Fishman C, Mihm MC, Sober AJ: Diagnosis and management of nevi and cutaneous melanoma in infants and children. Clin Dermatol 20 (1): 44-50, 2002 Jan-Feb.11849894 21838479
Hamre MR, Chuba P, Bakhshi S, et al.: Cutaneous melanoma in childhood and adolescence. Pediatr Hematol Oncol 19 (5): 309-17, 2002 Jul-Aug.12078862 22073156
Ceballos PI, Ruiz-Maldonado R, Mihm MC: Melanoma in children. N Engl J Med 332 (10): 656-62, 1995.7845431 95147937
Schmid-Wendtner MH, Berking C, Baumert J, et al.: Cutaneous melanoma in childhood and adolescence: an analysis of 36 patients. J Am Acad Dermatol 46 (6): 874-9, 2002.12063484 22058119
Pappo AS: Melanoma in children and adolescents. Eur J Cancer 39 (18): 2651-61, 2003.14642927
Huynh PM, Grant-Kels JM, Grin CM: Childhood melanoma: update and treatment. Int J Dermatol 44 (9): 715-23, 2005.16135138
Christenson LJ, Borrowman TA, Vachon CM, et al.: Incidence of basal cell and squamous cell carcinomas in a population younger than 40 years. JAMA 294 (6): 681-90, 2005.16091570
National Cancer Institute: SEER Stat Fact Sheets: Melanoma of the Skin. Bethesda, Md: National Cancer Institute. Available online (https://seer.cancer.gov/statfacts/html/melan.html). Last accessed December 15, 2023.
National Cancer Institute: NCCR*Explorer: An interactive website for NCCR cancer statistics. Bethesda, MD: National Cancer Institute. Available online (https://NCCRExplorer.ccdi.cancer.gov/). Last accessed February 25, 2025.
Paulson KG, Gupta D, Kim TS, et al.: Age-Specific Incidence of Melanoma in the United States. JAMA Dermatol 156 (1): 57-64, 2020.31721989
Moscarella E, Zalaudek I, Cerroni L, et al.: Excised melanocytic lesions in children and adolescents - a 10-year survey. Br J Dermatol 167 (2): 368-73, 2012.22428965

## Risk Factors

Conditions associated with an increased risk of developing melanoma in children and adolescents include the following:

- Giant melanocytic nevi.[1]
- Xeroderma pigmentosum. This is a rare recessive disorder characterized by extreme sensitivity to sunlight, keratosis, and various neurological manifestations.[1] For more information about xeroderma pigmentosum, see Genetics of Skin Cancer.
- Immunodeficiency or immunosuppression.[2]
- Hereditary retinoblastoma.[3]
- Werner syndrome.[4,5]
- Neurocutaneous melanosis. This is an unusual condition that arises in the context of congenital melanocytic nevi and is associated with large or multiple congenital nevi of the skin in association with meningeal melanosis or melanoma. Approximately 2.5% of patients with large congenital nevi develop this condition, and those with increased numbers of satellite nevi are at greatest risk.[6,7]
  Patients with central nervous system (CNS) melanomas arising in the context of congenital melanocytic nevi syndrome have a poor prognosis, with a mortality rate of 100%. Most of these patients have NRAS variants. Therefore, mitogen-activated protein kinase pathway inhibitors might be used in the treatment of this disease. Four children who received a MEK inhibitor experienced transient symptomatic improvements. However, all patients eventually died of disease progression.[8] A German registry identified five children with CNS melanomas who had neurocutaneous melanocytosis.[9] All patients died 0.3 to 0.8 years after they were diagnosed.
- Family history of melanoma.

Phenotypic traits associated with an increased risk of melanoma in adults have been documented in children and adolescents with melanoma and include the following:[10-16]

- Exposure to UV sunlight. Increased exposure to ambient UV radiation increases disease risk.
- Red hair.
- Blue eyes.
- Poor tanning ability.
- Freckling.
- Dysplastic nevi.
- Increased number of melanocytic nevi.

Germline pathogenic variants associated with an increased risk of melanoma in children include the following:

- MC1R gene. A multinational consortium performed a retrospective review of germline pathogenic variants in the MC1R gene.[17] The investigators analyzed data from 233 young patients (aged ≤20 years), 932 adult patients (aged ≥35 years), and 932 healthy adult controls. MC1R variants were more prevalent in childhood and adolescent patients with melanoma than in adult patients with melanoma. This finding was especially true for patients aged 18 years or younger.
- CDKN2A gene (p16 gene). Familial melanoma comprises 8% to 12% of melanoma cases. p16 germline pathogenic variants have been described in up to 7% of families with two first-degree relatives with melanoma and in up to 80% of families having one member with multiple primary melanomas.[18] In a prospective study of 60 families who had more than three members with melanoma,[19] one-half of the 60 families studied had a germline CDKN2A pathogenic variant. Regardless of CDKN2A status, melanoma-prone families were found to have sixfold to 28-fold higher percentages of members with pediatric melanoma compared with the general population of patients with melanoma in the United States. Within CDKN2A-positive families, pediatric patients with melanoma were significantly more likely to have multiple melanomas compared with their relatives who were older than 20 years at diagnosis (71% vs. 38%, respectively; P = .004). CDKN2A-positive families had significantly higher percentages of pediatric patients with melanoma compared with CDKN2A-negative families (11.1% vs. 2.5%, respectively; P = .004).
- MITF p.E318K variant. In one series of patients younger than 21 years, 3 of 123 patients (2.4%) had an MITF substitution considered to confer a moderate risk of developing cutaneous melanoma.[20,21]

### References

Ceballos PI, Ruiz-Maldonado R, Mihm MC: Melanoma in children. N Engl J Med 332 (10): 656-62, 1995.7845431 95147937
Pappo AS: Melanoma in children and adolescents. Eur J Cancer 39 (18): 2651-61, 2003.14642927
Kleinerman RA, Tucker MA, Tarone RE, et al.: Risk of new cancers after radiotherapy in long-term survivors of retinoblastoma: an extended follow-up. J Clin Oncol 23 (10): 2272-9, 2005.15800318
Shibuya H, Kato A, Kai N, et al.: A case of Werner syndrome with three primary lesions of malignant melanoma. J Dermatol 32 (9): 737-44, 2005.16361718
Kleinerman RA, Yu CL, Little MP, et al.: Variation of second cancer risk by family history of retinoblastoma among long-term survivors. J Clin Oncol 30 (9): 950-7, 2012.22355046
Hale EK, Stein J, Ben-Porat L, et al.: Association of melanoma and neurocutaneous melanocytosis with large congenital melanocytic naevi--results from the NYU-LCMN registry. Br J Dermatol 152 (3): 512-7, 2005.15787820
Makkar HS, Frieden IJ: Neurocutaneous melanosis. Semin Cutan Med Surg 23 (2): 138-44, 2004.15295923
Kinsler VA, O'Hare P, Jacques T, et al.: MEK inhibition appears to improve symptom control in primary NRAS-driven CNS melanoma in children. Br J Cancer 116 (8): 990-993, 2017.28253523
Abele M, Forchhammer S, Eigentler TK, et al.: Melanoma of the central nervous system based on neurocutaneous melanocytosis in childhood: A rare but fatal condition. Pediatr Blood Cancer 71 (4): e30859, 2024.38225622
Heffernan AE, O'Sullivan A: Pediatric sun exposure. Nurse Pract 23 (7): 67-8, 71-8, 83-6, 1998.9695084 98360197
Berg P, Lindelöf B: Differences in malignant melanoma between children and adolescents. A 35-year epidemiological study. Arch Dermatol 133 (3): 295-7, 1997.9080889 97235970
Elwood JM, Jopson J: Melanoma and sun exposure: an overview of published studies. Int J Cancer 73 (2): 198-203, 1997.9335442 97474418
Strouse JJ, Fears TR, Tucker MA, et al.: Pediatric melanoma: risk factor and survival analysis of the surveillance, epidemiology and end results database. J Clin Oncol 23 (21): 4735-41, 2005.16034049
Whiteman DC, Valery P, McWhirter W, et al.: Risk factors for childhood melanoma in Queensland, Australia. Int J Cancer 70 (1): 26-31, 1997.8985086
Tucker MA, Fraser MC, Goldstein AM, et al.: A natural history of melanomas and dysplastic nevi: an atlas of lesions in melanoma-prone families. Cancer 94 (12): 3192-209, 2002.12115352 22109426
Ducharme EE, Silverberg NB: Pediatric malignant melanoma: an update on epidemiology, detection, and prevention. Cutis 84 (4): 192-8, 2009.19911673
Pellegrini C, Botta F, Massi D, et al.: MC1R variants in childhood and adolescent melanoma: a retrospective pooled analysis of a multicentre cohort. Lancet Child Adolesc Health 3 (5): 332-342, 2019.30872112
Soufir N, Avril MF, Chompret A, et al.: Prevalence of p16 and CDK4 germline mutations in 48 melanoma-prone families in France. The French Familial Melanoma Study Group. Hum Mol Genet 7 (2): 209-16, 1998.9425228
Goldstein AM, Stidd KC, Yang XR, et al.: Pediatric melanoma in melanoma-prone families. Cancer 124 (18): 3715-3723, 2018.30207590
Pellegrini C, Raimondi S, Di Nardo L, et al.: Melanoma in children and adolescents: analysis of susceptibility genes in 123 Italian patients. J Eur Acad Dermatol Venereol 36 (2): 213-221, 2022.34664323
Guhan SM, Artomov M, McCormick S, et al.: Cancer risks associated with the germline MITF(E318K) variant. Sci Rep 10 (1): 17051, 2020.33051548

## Diagnostic Evaluation

The diagnosis of pediatric melanomas may be difficult, and many of these lesions may be confused with so-called melanocytic lesions with unknown malignant potential.[1] These lesions are biologically different from melanoma and benign nevi.[1,2] The terms Spitz nevus and spitzoid melanoma are also commonly used, creating additional confusion. One retrospective study found that children aged 10 years or older were more likely to present with amelanotic lesions, bleeding, uniform color, variable diameter, and elevation (such as a de novo bump).[3][Level of evidence C1]

The diagnostic evaluation of pediatric melanomas includes the following:

- Biopsy or excision. Biopsy or excision is necessary to diagnose any skin cancer and determine additional treatment. Although basal cell carcinomas and squamous cell carcinomas are generally curable with surgery alone, melanoma requires greater consideration because of its potential for metastasis. The width of surgical margins in melanoma is dictated by the site, size, and thickness of the lesion and ranges from 0.5 cm for in situ lesions to 2 cm or more for thicker lesions.[4] To achieve negative margins in children, wide excision with skin grafting may become necessary in selected cases. Partial shave biopsy may compromise microstaging and is associated with more invasive, definitive surgical treatments.[5]
- Lymph node evaluation. Examination of regional lymph nodes using sentinel lymph node biopsy has become routine in many centers.[6,7] Sentinel lymph node biopsy is recommended for patients with lesions measuring 0.8 cm or larger,[4] as well as for patients whose lesions are less than 0.8 cm and who have ulceration or other unfavorable features such as lymphovascular invasion, high mitotic rate, young age, or a positive margin biopsy.[4,6,8-10]
  The indications for this procedure in patients with spitzoid melanomas have not been clearly defined. In a systematic review of 541 patients with atypical Spitz tumors, 303 (56%) underwent sentinel lymph node biopsy and 119 (39%) had a positive sentinel node. Further lymph node dissection in 97 of these patients revealed additional positive nodes in 18 patients (19%).[11] Despite the high incidence of nodal metastases, only six patients developed disseminated disease. This finding challenges the prognostic and therapeutic benefit of this procedure in children with these lesions. In the future, molecular markers, such as the presence of TERT promoter variants, may help identify which patients might benefit from this procedure.[12]
  The role of complete lymph node dissection after a positive sentinel node and the value of adjuvant therapies in these patients is discussed in the Treatment of Childhood Melanoma section.
- Laboratory and imaging evaluation. Patients who present with conventional or adult-type melanoma should undergo laboratory and imaging evaluations based on adult guidelines. For more information, see the Stage Information for Melanoma section in Melanoma Treatment. In contrast, patients who are diagnosed with spitzoid melanomas have a low risk of recurrence and excellent clinical outcomes and do not require extensive radiographic evaluation either at diagnosis or follow-up.[13]

A Children's Oncology Group–led panel of experts from different specialties have developed recommendations for the diagnostic evaluation and surgical management of cutaneous melanomas, atypical Spitz tumors, and non-Spitz melanocytic tumors.[14]

### References

Berk DR, LaBuz E, Dadras SS, et al.: Melanoma and melanocytic tumors of uncertain malignant potential in children, adolescents and young adults--the Stanford experience 1995-2008. Pediatr Dermatol 27 (3): 244-54, 2010 May-Jun.20403119
Cerroni L, Barnhill R, Elder D, et al.: Melanocytic tumors of uncertain malignant potential: results of a tutorial held at the XXIX Symposium of the International Society of Dermatopathology in Graz, October 2008. Am J Surg Pathol 34 (3): 314-26, 2010.20118771
Cordoro KM, Gupta D, Frieden IJ, et al.: Pediatric melanoma: results of a large cohort study and proposal for modified ABCD detection criteria for children. J Am Acad Dermatol 68 (6): 913-25, 2013.23395590
Ferrari A, Lopez Almaraz R, Reguerre Y, et al.: Cutaneous melanoma in children and adolescents: The EXPeRT/PARTNER diagnostic and therapeutic recommendations. Pediatr Blood Cancer 68 (Suppl 4): e28992, 2021.34174159
Arjunan A, Wardrop M, Malek MM, et al.: Treatment outcomes following partial shave biopsy of atypical and malignant melanocytic tumors in pediatric patients. Melanoma Res 34 (6): 544-548, 2024.39235826
Shah NC, Gerstle JT, Stuart M, et al.: Use of sentinel lymph node biopsy and high-dose interferon in pediatric patients with high-risk melanoma: the Hospital for Sick Children experience. J Pediatr Hematol Oncol 28 (8): 496-500, 2006.16912589
Kayton ML, La Quaglia MP: Sentinel node biopsy for melanocytic tumors in children. Semin Diagn Pathol 25 (2): 95-9, 2008.18697712
Swetter SM, Thompson JA, Albertini MR, et al.: NCCN Guidelines® Insights: Melanoma: Cutaneous, Version 2.2021. J Natl Compr Canc Netw 19 (4): 364-376, 2021.33845460
Ariyan CE, Coit DG: Clinical aspects of sentinel lymph node biopsy in melanoma. Semin Diagn Pathol 25 (2): 86-94, 2008.18697711
Pacella SJ, Lowe L, Bradford C, et al.: The utility of sentinel lymph node biopsy in head and neck melanoma in the pediatric population. Plast Reconstr Surg 112 (5): 1257-65, 2003.14504508
Lallas A, Kyrgidis A, Ferrara G, et al.: Atypical Spitz tumours and sentinel lymph node biopsy: a systematic review. Lancet Oncol 15 (4): e178-83, 2014.24694641
Lee S, Barnhill RL, Dummer R, et al.: TERT Promoter Mutations Are Predictive of Aggressive Clinical Behavior in Patients with Spitzoid Melanocytic Neoplasms. Sci Rep 5: 11200, 2015.26061100
Halalsheh H, Kaste SC, Navid F, et al.: The role of routine imaging in pediatric cutaneous melanoma. Pediatr Blood Cancer 65 (12): e27412, 2018.30124237
Sargen MR, Barnhill RL, Elder DE, et al.: Evaluation and Surgical Management of Pediatric Cutaneous Melanoma and Atypical Spitz and Non-Spitz Melanocytic Tumors (Melanocytomas): A Report From Children's Oncology Group. J Clin Oncol 43 (9): 1157-1167, 2025.39365959

## Molecular Features

Accurate diagnosis of pediatric melanocytic lesions is essential for optimal risk stratification and treatment planning.

Melanoma-related conditions with malignant potential that arise in the pediatric population can be classified into the following three general groups:[1]

- Spitzoid melanocytic tumors ranging from atypical Spitz tumors to spitzoid melanomas.
- Melanoma arising in older adolescents that shares characteristics with adult melanoma (i.e., conventional melanoma).
- Large/giant congenital melanocytic nevus.

Lesions categorized as Spitz lesions are challenging to diagnose. Morphological assessment alone has significant limitations, and there is low interobserver expert agreement.[2]

Genomic alterations involving multiple genes have been reported in melanocytic lesions. The characteristics of each tumor are summarized in Table 1.

- The genomic landscape of spitzoid melanomas is characterized by kinase gene fusions involving various genes, including RET, MAP3K8, ROS1, NTRK1, ALK, MET, and BRAF.[3-6] These fusion genes have been reported in approximately 50% of cases and occur in a mutually exclusive manner.[1,4]
- In a retrospective analysis of spitzoid tumors from 49 patients, whole-genome and transcriptome sequencing (RNA-Seq) found in-frame fusions or C-terminal truncations of MAP3K8 in 33% of cases.[6]
- TERT promoter variants are uncommon in spitzoid melanocytic lesions and were observed in only 4 of 56 patients evaluated in one series. However, each of the four cases with TERT promoter variants experienced hematogenous metastases and died. This finding supports the potential for TERT promoter variants to predict aggressive clinical behavior in children with spitzoid melanocytic neoplasms, but additional study is needed to define the role of wild-type TERT promoter status in predicting clinical behavior in patients with primary site spitzoid tumors.[4]
- A retrospective analysis of 352 cases of Spitz nevi identified oncogenic drivers in 76% of the patients.[7] No microscopic features allowed the reliable prediction of ROS1 and NTRK1 overexpressing cases. In contrast, a plexiform pattern was associated with ALK overexpression. The pseudo-schwannoma variant was highly suggestive of NTRK3-rearranged cases. Atypical/malignant tumor, severe cellular atypia, and p16 loss were associated with MAP3K8 rearrangements. Sheet-like architecture and marked fibrosis of the stroma were associated with BRAF fusions.

In another study, 128 lesions were classified as Spitz tumors based on morphology (80 Spitz tumors, 26 Spitz melanomas, 22 melanomas with Spitz features).[8]

- Kinase fusions or truncations were present in 81% of Spitz tumor cases and in 77% of Spitz melanoma cases. By comparison, 84% of melanomas with Spitz features had BRAF, NRAS, or NF1 variants, and 61% of these had TERT promoter variants.
- Among patients in the Spitz tumor group whose melanoma recurred, one patient diagnosed with a BRAF V600E variant and a TERT promoter variant developed a distant recurrence and died. A second patient with a MAP3K8 fusion had a local recurrence.
- Two patients with Spitz melanoma had recurrences and both had BRAF V600E variants.
- Of the three patients in the melanoma with spitzoid features group who had a recurrence, all had either a BRAF or NRAS variant with a concomitant TERT promoter variant.
- After reclassifying these patients by their clinical and genomic characteristics, and by incorporating the BRAF or NRAS variants into the melanoma with Spitz features category, a significant difference in recurrence-free survival rates could be detected among the groups with Spitz tumors. This finding suggests that incorporation of genomic features can greatly improve the classification of these lesions.

Conventional melanoma. The genomic landscape of conventional melanoma in children is represented by many of the genomic alterations that are found in adults with melanoma.[1] A report from the Pediatric Cancer Genome Project observed that 15 cases of conventional melanoma had high burdens of somatic single-nucleotide variants (SNV), TERT promoter variants (12 of 13), and activating BRAF V600 variants (13 of 15). The melanoma cases also had variant spectrum signatures consistent with UV light damage. In addition, two-thirds of the cases had MC1R variants associated with an increased susceptibility to melanoma. An Australian study compared the whole-genome sequencing of melanomas in adolescents and young adults (age range, 15–30 years) with the sequencing of melanomas in older adults.[9] The frequencies of somatic variants in BRAF (96%) and PTEN (36%) in the adolescent and young adult cohort were double the rates observed in the adult cohort. Adolescent and young adult melanomas contained a higher proportion of variant signatures unrelated to UV radiation than did mature adult melanomas, as a proportion of total variant burden.

Large congenital melanocytic nevi. Large congenital melanocytic nevi are reported to have activating NRAS Q61 variants with no other recurring variants noted.[10] Somatic mosaicism for NRAS Q61 variants has also been reported in patients with multiple congenital melanocytic nevi and neurocutaneous melanosis.[11]

Integrating genomic analysis in the evaluation of pediatric melanocytic lesions can optimize diagnostic accuracy and provide important prognostic information for the treating physician. In a prospective registry of 70 patients with pediatric melanocytic lesions, the use of an integrated clinicopathological and genomic assessment optimized the pathological diagnosis and improved the ability to predict clinical outcomes in these patients.[12]

a. Atypical Spitz tumor/Spitz melanoma.
  - Patients with atypical Spitz tumors/Spitz melanomas were younger and had tumors predominantly located in the extremities.
  - Genomic lesions in these patients were characterized by kinase fusions most often involving MAP3K8 and ALK.
  - Even though 62% of patients who had nodes sampled had nodal disease, none developed distant metastases and two developed locoregional recurrences.
  - Of the 33 patients tested, none of them had TERT promoter variants. However, CDKN2A was deleted in 15 patients. These findings suggest that TERT promoter variants might be better predictors of aggressive clinical behavior (development of metastases) in these lesions.
b. Conventional melanoma.
  - Patients with conventional melanoma (n = 17) were older and their tumors were more commonly located on the scalp or trunk.
  - Seven of 12 patients had a positive sentinel node.
  - Eleven of 17 patients had BRAF V600E variants.
  - Seven of 16 patients had TERT promoter variants, and three of these patients died.
c. Giant nevi.
  - Of the four patients with melanoma arising in a giant nevi, all had NRAS Q61 variants and all died of their disease.

Table 1. Characteristics of Melanocytic Lesions

Tumor | Affected Gene
Melanoma | BRAF, NRAS, KIT, NF1
Spitz melanoma | Kinase fusions (RET, ROS, MET, ALK, BRAF, MAP3K8, NTRK1); BAP1 loss in the presence of BRAF variant
Spitz nevus | HRAS; BRAF and NRAS (uncommon); kinase fusions (ROS, ALK, NTRK1, BRAF, RET, MAP3K8)
Acquired nevus | BRAF
Dysplastic nevus | BRAF, NRAS
Blue nevus | GNAQ
Ocular melanoma | GNAQ
Congenital nevi | NRAS

### References

Lu C, Zhang J, Nagahawatte P, et al.: The genomic landscape of childhood and adolescent melanoma. J Invest Dermatol 135 (3): 816-23, 2015.25268584
Gerami P, Busam K, Cochran A, et al.: Histomorphologic assessment and interobserver diagnostic reproducibility of atypical spitzoid melanocytic neoplasms with long-term follow-up. Am J Surg Pathol 38 (7): 934-40, 2014.24618612
Wiesner T, He J, Yelensky R, et al.: Kinase fusions are frequent in Spitz tumours and spitzoid melanomas. Nat Commun 5: 3116, 2014.24445538
Lee S, Barnhill RL, Dummer R, et al.: TERT Promoter Mutations Are Predictive of Aggressive Clinical Behavior in Patients with Spitzoid Melanocytic Neoplasms. Sci Rep 5: 11200, 2015.26061100
Yeh I, Botton T, Talevich E, et al.: Activating MET kinase rearrangements in melanoma and Spitz tumours. Nat Commun 6: 7174, 2015.26013381
Newman S, Fan L, Pribnow A, et al.: Clinical genome sequencing uncovers potentially targetable truncations and fusions of MAP3K8 in spitzoid and other melanomas. Nat Med 25 (4): 597-602, 2019.30833747
Kervarrec T, Pissaloux D, Tirode F, et al.: Morphologic features in a series of 352 Spitz melanocytic proliferations help predict their oncogenic drivers. Virchows Arch 480 (2): 369-382, 2022.34761304
Quan VL, Zhang B, Zhang Y, et al.: Integrating Next-Generation Sequencing with Morphology Improves Prognostic and Biologic Classification of Spitz Neoplasms. J Invest Dermatol 140 (8): 1599-1608, 2020.32004563
Wilmott JS, Johansson PA, Newell F, et al.: Whole genome sequencing of melanomas in adolescent and young adults reveals distinct mutation landscapes and the potential role of germline variants in disease susceptibility. Int J Cancer 144 (5): 1049-1060, 2019.30178487
Charbel C, Fontaine RH, Malouf GG, et al.: NRAS mutation is the sole recurrent somatic mutation in large congenital melanocytic nevi. J Invest Dermatol 134 (4): 1067-74, 2014.24129063
Kinsler VA, Thomas AC, Ishida M, et al.: Multiple congenital melanocytic nevi and neurocutaneous melanosis are caused by postzygotic mutations in codon 61 of NRAS. J Invest Dermatol 133 (9): 2229-36, 2013.23392294
Pappo AS, McPherson V, Pan H, et al.: A prospective, comprehensive registry that integrates the molecular analysis of pediatric and adolescent melanocytic lesions. Cancer 127 (20): 3825-3831, 2021.34228365

## Prognosis and Prognostic Factors

Children and adolescents with melanoma generally have a favorable outcome. Table 2 shows the 5-year survival rates for children and adolescents with melanoma in the United States by age for the years between 2013 and 2019.[1]

Table 2. Survival Rates for Children and Adolescents With Melanoma in the United States Between 2013 and 2019^a^

Age (y) | 5-Year Relative Survival Rate (%) | Lower 95% Confidence Interval | Upper 95% Confidence Interval
Age <1 | 85 | 63 | 94
Ages 1–4 | 83 | 71 | 90
Ages 5–9 | 99 | 95 | 100
Ages 10–14 | 95 | 90 | 97
Ages 15–19 | 97 | 95 | 99

^a^Adapted from the National Childhood Cancer Registry. NCCR*Explorer: An interactive website for NCCR cancer statistics [Internet]. National Cancer Institute; 2023 Sep 7. [updated: 2023 Sep 8; cited 2024 Aug 12]. Available from: https://nccrexplorer.ccdi.cancer.gov.

Pediatric melanoma shares many similarities with adult melanoma, and the prognosis depends on disease stage.[2] As in adults, most pediatric patients (about 75%) have localized disease and excellent outcomes.[3-5]

The outcome for patients with nodal disease is intermediate, with about 60% expected to survive long term.[4-6] In one study, the outcome for patients with metastatic disease was favorable,[4] but this result was not duplicated in another study from the National Cancer Database.[6]

Children younger than 10 years who have melanoma often present with the following:[2,4,6,7]

- Poor prognostic features.
- Non-White races.
- Head and neck primary tumors.
- Thicker primary lesions.
- Higher incidence of spitzoid morphology vascular invasion and nodal metastases.
- Syndromes that predispose them to melanoma.

The use of sentinel lymph node biopsy for staging pediatric melanoma has become widespread. Primary tumor thickness and ulceration have been correlated with a higher incidence of nodal involvement.[8] Studies addressing nodal involvement and the lack of effect on outcome have reported the following findings:

- Younger patients appear to have a higher incidence of nodal involvement, but this finding does not appear to significantly impact clinical outcomes.[7,9]
- In other series of pediatric melanoma, a higher incidence of nodal involvement did not appear to impact survival.[10-12]
- In a retrospective cohort study from the National Cancer Database, all records of patients with an index diagnosis of melanoma from 1998 to 2011 were reviewed. The data were abstracted from medical records, operative reports, and pathology reports and did not undergo central review. A total of 350,928 patients with adequate information were identified; 306 patients were aged 1 to 10 years (pediatric), and 3,659 patients were aged 11 to 20 years (adolescent).[13]
  - Pediatric patients had longer overall survival (OS) than adolescent patients (hazard ratio [HR], 0.50; 95% confidence interval [CI], 0.25–0.98) and patients older than 20 years (HR, 0.11; 95% CI, 0.06–0.21).
  - Adolescents had longer OS than adults.
  - No difference in OS was found between pediatric node-positive patients and node-negative patients.
  - In pediatric patients, sentinel lymph node biopsy and completion of lymph node dissection were not associated with increased OS.
  - In adolescents, nodal positivity was a significant negative prognostic indicator (HR, 4.82; 95% CI, 3.38–6.87).

The association of lesion thickness with clinical outcome is controversial in pediatric melanoma.[4-6,14-18] In addition, it is unclear why some variables that correlate with survival in adults are not replicated in children. One possible explanation for this difference might be the inclusion of patients who have lesions that are not true melanomas in the adult series, considering the problematic histological distinction between true melanoma and melanocytic lesions with unknown malignant potential. These patients are not included in pediatric trials.[19,20]

### References

National Cancer Institute: NCCR*Explorer: An interactive website for NCCR cancer statistics. Bethesda, MD: National Cancer Institute. Available online (https://NCCRExplorer.ccdi.cancer.gov/). Last accessed February 25, 2025.
Paradela S, Fonseca E, Pita-Fernández S, et al.: Prognostic factors for melanoma in children and adolescents: a clinicopathologic, single-center study of 137 Patients. Cancer 116 (18): 4334-44, 2010.20549825
Wong JR, Harris JK, Rodriguez-Galindo C, et al.: Incidence of childhood and adolescent melanoma in the United States: 1973-2009. Pediatrics 131 (5): 846-54, 2013.23589817
Strouse JJ, Fears TR, Tucker MA, et al.: Pediatric melanoma: risk factor and survival analysis of the surveillance, epidemiology and end results database. J Clin Oncol 23 (21): 4735-41, 2005.16034049
Brecht IB, Garbe C, Gefeller O, et al.: 443 paediatric cases of malignant melanoma registered with the German Central Malignant Melanoma Registry between 1983 and 2011. Eur J Cancer 51 (7): 861-8, 2015.25794606
Lange JR, Palis BE, Chang DC, et al.: Melanoma in children and teenagers: an analysis of patients from the National Cancer Data Base. J Clin Oncol 25 (11): 1363-8, 2007.17416855
Moore-Olufemi S, Herzog C, Warneke C, et al.: Outcomes in pediatric melanoma: comparing prepubertal to adolescent pediatric patients. Ann Surg 253 (6): 1211-5, 2011.21451389
Mu E, Lange JR, Strouse JJ: Comparison of the use and results of sentinel lymph node biopsy in children and young adults with melanoma. Cancer 118 (10): 2700-7, 2012.22565612
Balch CM, Soong SJ, Gershenwald JE, et al.: Age as a prognostic factor in patients with localized melanoma and regional metastases. Ann Surg Oncol 20 (12): 3961-8, 2013.23838920
Gibbs P, Moore A, Robinson W, et al.: Pediatric melanoma: are recent advances in the management of adult melanoma relevant to the pediatric population. J Pediatr Hematol Oncol 22 (5): 428-32, 2000 Sep-Oct.11037854 20489554
Livestro DP, Kaine EM, Michaelson JS, et al.: Melanoma in the young: differences and similarities with adult melanoma: a case-matched controlled analysis. Cancer 110 (3): 614-24, 2007.17577228
Han D, Zager JS, Han G, et al.: The unique clinical characteristics of melanoma diagnosed in children. Ann Surg Oncol 19 (12): 3888-95, 2012.22864798
Lorimer PD, White RL, Walsh K, et al.: Pediatric and Adolescent Melanoma: A National Cancer Data Base Update. Ann Surg Oncol 23 (12): 4058-4066, 2016.27364504
Rao BN, Hayes FA, Pratt CB, et al.: Malignant melanoma in children: its management and prognosis. J Pediatr Surg 25 (2): 198-203, 1990.2303989
Aldrink JH, Selim MA, Diesen DL, et al.: Pediatric melanoma: a single-institution experience of 150 patients. J Pediatr Surg 44 (8): 1514-21, 2009.19635298
Tcheung WJ, Marcello JE, Puri PK, et al.: Evaluation of 39 cases of pediatric cutaneous head and neck melanoma. J Am Acad Dermatol 65 (2): e37-42, 2011.21075477
Ferrari A, Bisogno G, Cecchetto G, et al.: Cutaneous melanoma in children and adolescents: the Italian rare tumors in pediatric age project experience. J Pediatr 164 (2): 376-82.e1-2, 2014.24252782
Stanelle EJ, Busam KJ, Rich BS, et al.: Early-stage non-Spitzoid cutaneous melanoma in patients younger than 22 years of age at diagnosis: long-term follow-up and survival analysis. J Pediatr Surg 50 (6): 1019-23, 2015.25819019
Lohmann CM, Coit DG, Brady MS, et al.: Sentinel lymph node biopsy in patients with diagnostically controversial spitzoid melanocytic tumors. Am J Surg Pathol 26 (1): 47-55, 2002.11756768
Su LD, Fullen DR, Sondak VK, et al.: Sentinel lymph node biopsy for patients with problematic spitzoid melanocytic lesions: a report on 18 patients. Cancer 97 (2): 499-507, 2003.12518375

## Special Considerations for the Treatment of Children With Cancer

Cancer in children and adolescents is rare, although the overall incidence has slowly increased since 1975.[1] Children and adolescents with cancer should be referred to medical centers that have a multidisciplinary team of cancer specialists with experience treating the cancers that occur during childhood and adolescence. This multidisciplinary team approach incorporates the skills of the following pediatric specialists and others to ensure that children receive treatment, supportive care, and rehabilitation to achieve optimal survival and quality of life:

- Primary care physicians.
- Pediatric surgeons.
- Pathologists.
- Pediatric radiation oncologists.
- Pediatric medical oncologists and hematologists.
- Ophthalmologists.
- Rehabilitation specialists.
- Pediatric oncology nurses.
- Social workers.
- Child-life professionals.
- Psychologists.
- Nutritionists.

For specific information about supportive care for children and adolescents with cancer, see the summaries on Supportive and Palliative Care (https://www.cancer.gov/publications/pdq/information-summaries/supportive-care).

The American Academy of Pediatrics has outlined guidelines for pediatric cancer centers and their role in the treatment of children and adolescents with cancer.[2] At these centers, clinical trials are available for most types of cancer that occur in children and adolescents, and the opportunity to participate is offered to most patients and their families. Clinical trials for children and adolescents diagnosed with cancer are generally designed to compare potentially better therapy with current standard therapy. Other types of clinical trials test novel therapies when there is no standard therapy for a cancer diagnosis. Most of the progress in identifying curative therapies for childhood cancers has been achieved through clinical trials. Information about ongoing clinical trials is available from the NCI website (https://www.cancer.gov/research/participate/clinical-trials).

Dramatic improvements in survival have been achieved for children and adolescents with cancer. Between 1975 and 2020, childhood cancer mortality decreased by more than 50%.[3-5] Childhood and adolescent cancer survivors require close monitoring because side effects of cancer therapy may persist or develop months or years after treatment. For information about the incidence, type, and monitoring of late effects in childhood and adolescent cancer survivors, see Late Effects of Treatment for Childhood Cancer.

Childhood cancer is a rare disease, with about 15,000 cases diagnosed annually in the United States in individuals younger than 20 years.[6] The U.S. Rare Diseases Act of 2002 (https://www.congress.gov/107/plaws/publ280/PLAW-107publ280.pdf) defines a rare disease as one that affects populations smaller than 200,000 people in the United States. Therefore, all pediatric cancers are considered rare.

The designation of a rare tumor is not uniform among pediatric and adult groups. In adults, rare cancers are defined as those with an annual incidence of fewer than six cases per 100,000 people. They account for up to 24% of all cancers diagnosed in the European Union and about 20% of all cancers diagnosed in the United States.[7,8] In children and adolescents, the designation of a rare tumor is not uniform among international groups, as follows:

- A consensus effort between the European Union Joint Action on Rare Cancers and the European Cooperative Study Group for Rare Pediatric Cancers estimated that 11% of all cancers in patients younger than 20 years could be categorized as very rare. This consensus group defined very rare cancers as those with annual incidences of fewer than two cases per 1 million people. However, three additional histologies (thyroid carcinoma, melanoma, and testicular cancer) with incidences of more than two cases per 1 million people were also included in the very rare group due to a lack of knowledge and expertise in the management of these tumors.[9]
- The Children's Oncology Group defines rare pediatric cancers as those listed in the International Classification of Childhood Cancer subgroup XI, which includes thyroid cancers, melanomas and nonmelanoma skin cancers, and multiple types of carcinomas (e.g., adrenocortical carcinomas, nasopharyngeal carcinomas, and most adult-type carcinomas such as breast cancers and colorectal cancers).[10] These diagnoses account for about 5% of the cancers diagnosed in children aged 0 to 14 years and about 27% of the cancers diagnosed in adolescents aged 15 to 19 years.[4]
  Most cancers in subgroup XI are either melanomas or thyroid cancers, with other cancer types accounting for only 2% of the cancers diagnosed in children aged 0 to 14 years and 9.3% of the cancers diagnosed in adolescents aged 15 to 19 years.

These rare cancers are extremely challenging to study because of the relatively few patients with any individual diagnosis, the predominance of rare cancers in the adolescent population, and the small number of clinical trials for adolescents with rare cancers.

Information about these tumors may also be found in sources relevant to adults with cancer, such as Melanoma Treatment.

### References

Smith MA, Seibel NL, Altekruse SF, et al.: Outcomes for children and adolescents with cancer: challenges for the twenty-first century. J Clin Oncol 28 (15): 2625-34, 2010.20404250
American Academy of Pediatrics: Standards for pediatric cancer centers. Pediatrics 134 (2): 410-4, 2014. Also available online (https://pediatrics.aappublications.org/content/134/2/410). Last accessed February 25, 2025.
Smith MA, Altekruse SF, Adamson PC, et al.: Declining childhood and adolescent cancer mortality. Cancer 120 (16): 2497-506, 2014.24853691
National Cancer Institute: NCCR*Explorer: An interactive website for NCCR cancer statistics. Bethesda, MD: National Cancer Institute. Available online (https://NCCRExplorer.ccdi.cancer.gov/). Last accessed February 25, 2025.
Surveillance Research Program, National Cancer Institute: SEER*Explorer: An interactive website for SEER cancer statistics. Bethesda, MD: National Cancer Institute. Available online (https://seer.cancer.gov/statistics-network/explorer/). Last accessed December 30, 2024.
Ward E, DeSantis C, Robbins A, et al.: Childhood and adolescent cancer statistics, 2014. CA Cancer J Clin 64 (2): 83-103, 2014 Mar-Apr.24488779
Gatta G, Capocaccia R, Botta L, et al.: Burden and centralised treatment in Europe of rare tumours: results of RARECAREnet-a population-based study. Lancet Oncol 18 (8): 1022-1039, 2017.28687376
DeSantis CE, Kramer JL, Jemal A: The burden of rare cancers in the United States. CA Cancer J Clin 67 (4): 261-272, 2017.28542893
Ferrari A, Brecht IB, Gatta G, et al.: Defining and listing very rare cancers of paediatric age: consensus of the Joint Action on Rare Cancers in cooperation with the European Cooperative Study Group for Pediatric Rare Tumors. Eur J Cancer 110: 120-126, 2019.30785015
Pappo AS, Krailo M, Chen Z, et al.: Infrequent tumor initiative of the Children's Oncology Group: initial lessons learned and their impact on future plans. J Clin Oncol 28 (33): 5011-6, 2010.20956621

## Treatment of Childhood Melanoma

The European Cooperative Study Group for Pediatric Rare Tumors within the PARTNER project (Paediatric Rare Tumours Network - European Registry) has published recommendations for the diagnosis and treatment of children and adolescents with cutaneous melanoma. Some of these recommendations have been incorporated and summarized in the sections below.[1] A Children's Oncology Group–led panel of experts from different specialties have also developed recommendations for the diagnostic evaluation and surgical management of cutaneous melanomas, atypical Spitz tumors, and non-Spitz melanocytic tumors.[2]

Treatment options for childhood melanoma include the following:

1. Surgery and, in certain cases, sentinel lymph node biopsy and lymph node dissection.
2. Immune checkpoint inhibitors or BRAF/MEK inhibitors.

### Surgery

Surgery is the treatment of choice for patients with localized melanoma. Current guidelines recommend margins of resection as follows:

- 0.5 cm for melanoma in situ.
- 1 cm for melanoma thickness of less than 1 mm.
- 1 cm to 2 cm for melanoma thickness of 1.01 mm to 2 mm.
- 2 cm for tumor thickness of greater than 2 mm.

Sentinel lymph node biopsy should be considered in patients with thin lesions (≤1 mm) and ulceration, mitotic rate greater than 1/mm^2^, young age, and lesions larger than 1 mm with or without adverse features. Younger patients have a higher incidence of sentinel lymph node positivity, and this feature may adversely affect clinical outcomes.[3,4]

If the sentinel lymph node is positive, the option to undergo a complete lymph node dissection should be discussed. One adult trial included 1,934 patients with a positive sentinel node, identified by either immunohistochemistry or polymerase chain reaction. The patients were randomly assigned to undergo either complete lymph node dissection or observation. The 3-year melanoma-specific survival rate was similar in both groups (86%), whereas the disease-free survival (DFS) rate was slightly higher in the dissection group (68% vs. 63%; P = .05). This advantage in DFS was related to a decrease in the rate of nodal recurrences because there was no difference in the distant metastases–free survival rates. It remains unknown how these results will affect the future surgical management of children and adolescents with melanoma.[5]

### Immune Checkpoint Inhibitors or BRAF/MEK Inhibitors

Targeted therapies and immunotherapy that have been effective in adults with melanoma should be pursued in pediatric patients with conventional melanoma and metastatic, recurrent, or progressive disease.

Evidence (targeted therapy and immunotherapy):

1. A phase I trial of ipilimumab in children and adolescents, at a dose of 5 mg/kg or 10 mg/kg every 3 weeks for four cycles, enrolled 12 patients with melanoma.[6]
  - One patient had prolonged stable disease.
  - This treatment demonstrated a similar toxicity profile as that seen in adults.
2. A phase II study of ipilimumab for adolescents with melanoma failed to achieve accrual goals and was closed. However, there was reported activity in patients with melanoma who were aged 12 to 17 years, with a similar safety profile as that seen in adults.[7][Level of evidence B4]
  - At 1 year, three of four patients who received 3 mg/kg and five of eight patients who received 10 mg/kg were alive.
  - Two patients who received 10 mg/kg had partial responses, and one patient who received 3 mg/kg had stable disease.
  - In adults with completely resected stage III cutaneous melanoma, prolonged DFS and overall survival have been seen with ipilimumab given at a dose of 10 mg/kg every 3 weeks for four doses, followed by one dose every 3 months for up to 3 years. This regimen caused little impairment in health-related quality of life.
3. In a phase I/II trial of nivolumab for children and young adults with relapsed or refractory solid tumors or lymphoma, patients were treated with a dose of 3 mg/kg every 14 days.[8]
  - The one patient with melanoma did not respond to therapy.
4. An open-label, single-arm, phase I/II trial of pembrolizumab for pediatric patients with advanced melanoma or programmed death-ligand 1 (PD-L1)–positive, advanced, relapsed, or refractory solid tumors or lymphoma reported the following:[9]
  - Eight patients with melanoma were enrolled, and no responses were observed in these patients.
  - Five of these patients were PD-L1 negative.
5. The Children's Oncology Group conducted a phase I/II trial of ipilimumab and nivolumab in 55 children and young adults with refractory or recurrent solid tumors.[10]
  - The study identified a recommended phase II dose of 3 mg/kg for nivolumab and 1 mg/kg for ipilimumab.
  - No patients with melanoma were enrolled in the trial. However, partial responses were seen in one patient with rhabdomyosarcoma and one patient with Ewing sarcoma.
6. A retrospective review identified 99 patients with melanoma (aged 18 years or younger) who were treated with systemic therapy at 15 Italian academic centers. Eighty-one patients received anti–PD-1 therapy. The median age was 14 years (range, 2–18 years), and 37 patients were aged 12 years or younger. Thirty-eight patients received anti–PD-1 therapy in the adjuvant setting.[11]
  - Of the patients who received adjuvant anti–PD-1 therapy, the 3-year progression-free survival rate was 70.6%, and the overall survival (OS) rate was 81.1%.
  - Of the 56 patients who received systemic therapy for advanced disease, 43 received first-line anti–PD-1–based therapy, while 12 patients received a second line, and 5 patients received a third line. Among patients who received first-line therapy with anti–PD-1 monotherapy, the objective response rate was 25%, and the 3-year OS rate was 34%.
  - Toxicities were consistent with previous studies that included adult patients with melanoma.
7. Dabrafenib and trametinib have been studied in two trials for pediatric patients with BRAF V600-altered low-grade gliomas. The U.S. Food and Drug Administration (FDA) approved this combination for this indication.[12,13] The FDA has also approved this combination for the treatment of patients with melanoma.

No trials have been conducted specifically for the treatment of pediatric patients with melanoma. However, the FDA has approved the following immune and targeted therapies for pediatric and adolescent patients with melanoma based on studies of adult populations with or without pediatric participants:

- Based on the positive results of two randomized clinical trials, the FDA approved adjuvant pembrolizumab for the treatment of patients aged 12 years and older with resected stage IIb, IIc, and III melanoma.[14,15]
- Based on the positive results of two randomized clinical trials, the FDA approved adjuvant nivolumab for the treatment of patients aged 12 years and older with resected stage IIb to IV melanoma.[16,17]
- Based on the positive results of one adult randomized clinical trial, the FDA approved nivolumab and ipilimumab for the treatment of children aged 12 years and older with unresectable or metastatic melanoma.[18]
- Based on the positive results of one randomized clinical trial, the FDA approved nivolumab with relatlimab for the treatment of children aged 12 years and older with unresectable or metastatic melanoma.[19]
- Although there have not been any prospective clinical trials using BRAF/MEK inhibitors in children and adolescents with melanoma, two adult studies have shown that the adjuvant combination of dabrafenib and trametinib results in a significantly lower risk of recurrence in patients with surgically resected stage III melanoma and in patients with previously untreated BRAF V600-altered metastatic melanoma.[20,21] The FDA granted accelerated approval to this drug combination for the treatment of patients with unresectable or metastatic melanoma who have BRAF V600E or V600K variants and for the adjuvant treatment of patients with melanoma who have BRAF V600E or V600K variants.

For more information, see Melanoma Treatment.

### References

Ferrari A, Lopez Almaraz R, Reguerre Y, et al.: Cutaneous melanoma in children and adolescents: The EXPeRT/PARTNER diagnostic and therapeutic recommendations. Pediatr Blood Cancer 68 (Suppl 4): e28992, 2021.34174159
Sargen MR, Barnhill RL, Elder DE, et al.: Evaluation and Surgical Management of Pediatric Cutaneous Melanoma and Atypical Spitz and Non-Spitz Melanocytic Tumors (Melanocytomas): A Report From Children's Oncology Group. J Clin Oncol 43 (9): 1157-1167, 2025.39365959
Mu E, Lange JR, Strouse JJ: Comparison of the use and results of sentinel lymph node biopsy in children and young adults with melanoma. Cancer 118 (10): 2700-7, 2012.22565612
Han D, Zager JS, Han G, et al.: The unique clinical characteristics of melanoma diagnosed in children. Ann Surg Oncol 19 (12): 3888-95, 2012.22864798
Eggermont AM, Chiarion-Sileni V, Grob JJ, et al.: Prolonged Survival in Stage III Melanoma with Ipilimumab Adjuvant Therapy. N Engl J Med 375 (19): 1845-1855, 2016.27717298
Merchant MS, Wright M, Baird K, et al.: Phase I Clinical Trial of Ipilimumab in Pediatric Patients with Advanced Solid Tumors. Clin Cancer Res 22 (6): 1364-70, 2016.26534966
Geoerger B, Bergeron C, Gore L, et al.: Phase II study of ipilimumab in adolescents with unresectable stage III or IV malignant melanoma. Eur J Cancer 86: 358-363, 2017.29100190
Davis KL, Fox E, Merchant MS, et al.: Nivolumab in children and young adults with relapsed or refractory solid tumours or lymphoma (ADVL1412): a multicentre, open-label, single-arm, phase 1-2 trial. Lancet Oncol 21 (4): 541-550, 2020.32192573
Geoerger B, Kang HJ, Yalon-Oren M, et al.: Pembrolizumab in paediatric patients with advanced melanoma or a PD-L1-positive, advanced, relapsed, or refractory solid tumour or lymphoma (KEYNOTE-051): interim analysis of an open-label, single-arm, phase 1-2 trial. Lancet Oncol 21 (1): 121-133, 2020.31812554
Davis KL, Fox E, Isikwei E, et al.: A Phase I/II Trial of Nivolumab plus Ipilimumab in Children and Young Adults with Relapsed/Refractory Solid Tumors: A Children's Oncology Group Study ADVL1412. Clin Cancer Res 28 (23): 5088-5097, 2022.36190525
Mandalà M, Ferrari A, Brecht IB, et al.: Efficacy of anti PD-1 therapy in children and adolescent melanoma patients (MELCAYA study). Eur J Cancer 211: 114305, 2024.39236557
Hargrave DR, Bouffet E, Tabori U, et al.: Efficacy and Safety of Dabrafenib in Pediatric Patients with BRAF V600 Mutation-Positive Relapsed or Refractory Low-Grade Glioma: Results from a Phase I/IIa Study. Clin Cancer Res 25 (24): 7303-7311, 2019.31811016
Bouffet E, Hansford JR, Garrè ML, et al.: Dabrafenib plus Trametinib in Pediatric Glioma with BRAF V600 Mutations. N Engl J Med 389 (12): 1108-1120, 2023.37733309
Eggermont AMM, Blank CU, Mandala M, et al.: Adjuvant Pembrolizumab versus Placebo in Resected Stage III Melanoma. N Engl J Med 378 (19): 1789-1801, 2018.29658430
Luke JJ, Rutkowski P, Queirolo P, et al.: Pembrolizumab versus placebo as adjuvant therapy in completely resected stage IIB or IIC melanoma (KEYNOTE-716): a randomised, double-blind, phase 3 trial. Lancet 399 (10336): 1718-1729, 2022.35367007
Kirkwood JM, Del Vecchio M, Weber J, et al.: Adjuvant nivolumab in resected stage IIB/C melanoma: primary results from the randomized, phase 3 CheckMate 76K trial. Nat Med 29 (11): 2835-2843, 2023.37845511
Weber J, Mandala M, Del Vecchio M, et al.: Adjuvant Nivolumab versus Ipilimumab in Resected Stage III or IV Melanoma. N Engl J Med 377 (19): 1824-1835, 2017.28891423
Wolchok JD, Chiarion-Sileni V, Gonzalez R, et al.: Overall Survival with Combined Nivolumab and Ipilimumab in Advanced Melanoma. N Engl J Med 377 (14): 1345-1356, 2017.28889792
Tawbi HA, Schadendorf D, Lipson EJ, et al.: Relatlimab and Nivolumab versus Nivolumab in Untreated Advanced Melanoma. N Engl J Med 386 (1): 24-34, 2022.34986285
Robert C, Karaszewska B, Schachter J, et al.: Improved overall survival in melanoma with combined dabrafenib and trametinib. N Engl J Med 372 (1): 30-9, 2015.25399551
Long GV, Hauschild A, Santinami M, et al.: Adjuvant Dabrafenib plus Trametinib in Stage III BRAF-Mutated Melanoma. N Engl J Med 377 (19): 1813-1823, 2017.28891408

## Treatment Options Under Clinical Evaluation for Childhood Melanoma

Information about National Cancer Institute (NCI)–supported clinical trials can be found on the NCI website (https://www.cancer.gov/research/participate/clinical-trials-search). For information about clinical trials sponsored by other organizations, see the ClinicalTrials.gov website (https://clinicaltrials.gov/).

The following is an example of a national and/or institutional clinical trial that is currently being conducted:

- NCT02332668 (https://www.cancer.gov/clinicaltrials/NCT02332668) (A Study of Pembrolizumab [MK-3475] in Pediatric Participants With Advanced Melanoma or Advanced, Relapsed, or Refractory PD-L1-Positive Solid Tumors or Lymphoma [MK-3475-051/KEYNOTE-051]): This is a two-part study of pembrolizumab in pediatric participants who have either advanced melanoma or a programmed cell death ligand 1 (PD-L1)-positive advanced, relapsed, or refractory solid tumor or lymphoma. Part 1 will find the maximum tolerated dose/maximum administered dose, confirm the dose, and find the recommended phase II dose for pembrolizumab therapy. Part 2 will further evaluate the safety and efficacy of the phase II dose recommended for pediatric patients.

## Latest Updates to This Summary (04/03/2025)

The PDQ cancer information summaries are reviewed regularly and updated as new information becomes available. This section describes the latest changes made to this summary as of the date above.

Diagnostic Evaluation

Added text to state that partial shave biopsy may compromise microstaging and is associated with more invasive, definitive surgical treatments (cited Arjunan et al. as reference 5).

Added text to state that a Children's Oncology Group–led panel of experts from different specialties have developed recommendations for the diagnostic evaluation and surgical management of cutaneous melanomas, atypical Spitz tumors, and non-Spitz melanocytic tumors (cited Sargen et al. as reference 14).

Treatment of Childhood Melanoma

Added text to state that a Children's Oncology Group–led panel of experts from different specialties have developed recommendations for the diagnostic evaluation and surgical management of cutaneous melanomas, atypical Spitz tumors, and non-Spitz melanocytic tumors (cited Sargen et al. as reference 2).

Added text about the results of a retrospective review that identified 99 patients with melanoma who were treated with systemic therapy, 81 of whom received anti–PD-1 therapy (cited Mandalà et al. as reference 11).

This summary is written and maintained by the PDQ Pediatric Treatment Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/pediatric-treatment), which is editorially independent of NCI. The summary reflects an independent review of the literature and does not represent a policy statement of NCI or NIH. More information about summary policies and the role of the PDQ Editorial Boards in maintaining the PDQ summaries can be found on the About This PDQ Summary and PDQ® Cancer Information for Health Professionals (https://www.cancer.gov/publications/pdq) pages.

## About This PDQ Summary

### Purpose of This Summary

This PDQ cancer information summary for health professionals provides comprehensive, peer-reviewed, evidence-based information about the treatment of pediatric melanoma. It is intended as a resource to inform and assist clinicians in the care of their patients. It does not provide formal guidelines or recommendations for making health care decisions.

### Reviewers and Updates

This summary is reviewed regularly and updated as necessary by the PDQ Pediatric Treatment Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/pediatric-treatment), which is editorially independent of the National Cancer Institute (NCI). The summary reflects an independent review of the literature and does not represent a policy statement of NCI or the National Institutes of Health (NIH).

Board members review recently published articles each month to determine whether an article should:

- be discussed at a meeting,
- be cited with text, or
- replace or update an existing article that is already cited.

Changes to the summaries are made through a consensus process in which Board members evaluate the strength of the evidence in the published articles and determine how the article should be included in the summary.

The lead reviewers for Childhood Melanoma Treatment are:

- Denise Adams, MD (Children's Hospital Boston)
- Karen J. Marcus, MD, FACR (Dana-Farber of Boston Children's Cancer Center and Blood Disorders Harvard Medical School)
- William H. Meyer, MD
- Paul A. Meyers, MD (Memorial Sloan-Kettering Cancer Center)
- Thomas A. Olson, MD (Aflac Cancer and Blood Disorders Center of Children's Healthcare of Atlanta - Egleston Campus)
- Arthur Kim Ritchey, MD (Children's Hospital of Pittsburgh of UPMC)
- Carlos Rodriguez-Galindo, MD (St. Jude Children's Research Hospital)

Any comments or questions about the summary content should be submitted to Cancer.gov through the NCI website's Email Us (https://www.cancer.gov/contact/email-us). Do not contact the individual Board Members with questions or comments about the summaries. Board members will not respond to individual inquiries.

### Levels of Evidence

Some of the reference citations in this summary are accompanied by a level-of-evidence designation. These designations are intended to help readers assess the strength of the evidence supporting the use of specific interventions or approaches. The PDQ Pediatric Treatment Editorial Board uses a formal evidence ranking system in developing its level-of-evidence designations.

### Permission to Use This Summary

PDQ is a registered trademark. Although the content of PDQ documents can be used freely as text, it cannot be identified as an NCI PDQ cancer information summary unless it is presented in its entirety and is regularly updated. However, an author would be permitted to write a sentence such as “NCI’s PDQ cancer information summary about breast cancer prevention states the risks succinctly: [include excerpt from the summary].”

The preferred citation for this PDQ summary is:

PDQ® Pediatric Treatment Editorial Board. PDQ Childhood Melanoma Treatment. Bethesda, MD: National Cancer Institute. Updated <MM/DD/YYYY>. Available at: https://www.cancer.gov/types/skin/hp/child-melanoma-treatment-pdq. Accessed <MM/DD/YYYY>. [PMID: 31909946]

Images in this summary are used with permission of the author(s), artist, and/or publisher for use within the PDQ summaries only. Permission to use images outside the context of PDQ information must be obtained from the owner(s) and cannot be granted by the National Cancer Institute. Information about using the illustrations in this summary, along with many other cancer-related images, is available in Visuals Online (https://visualsonline.cancer.gov/), a collection of over 2,000 scientific images.

### Disclaimer

Based on the strength of the available evidence, treatment options may be described as either “standard” or “under clinical evaluation.” These classifications should not be used as a basis for insurance reimbursement determinations. More information on insurance coverage is available on Cancer.gov on the Managing Cancer Care (https://www.cancer.gov/about-cancer/managing-care) page.

### Contact Us

More information about contacting us or receiving help with the Cancer.gov website can be found on our Contact Us for Help (https://www.cancer.gov/contact) page. Questions can also be submitted to Cancer.gov through the website’s Email Us (https://www.cancer.gov/contact/email-us).